# Gastric Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of gastric cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Gastric Cancer

### Incidence and Mortality

Estimated new cases and deaths from gastric cancer in the United States in 2025:[1]

- New cases: 30,300.
- Deaths: 10,780.

### Epidemiology

This summary discusses the management of gastric adenocarcinoma, which accounts for 90% to 95% of all gastric malignancies. Changing epidemiological patterns in the United States regarding the anatomical location of esophagogastric cancers show a trend of decreased occurrence of distal or noncardia gastric cancers.[2] However, in people aged 25 to 39 years, there has been an increase in the incidence of noncardia gastric cancers, from 0.27 cases per 100,000 individuals (1977–1981) to 0.45 cases per 100,000 individuals (2002–2006).[2] Additional studies are needed to confirm the observed increases in noncardia gastric cancers in this specific age group.

In contrast to the overall stable trend for noncardia gastric cancers, earlier studies demonstrated an increased incidence of adenocarcinomas of the gastric cardia of 4% to 10% per year from the mid-1970s to the late 1980s.[3] Similarly, the incidence of gastroesophageal junction adenocarcinomas increased sharply, from 1.22 cases per 100,000 individuals (1973–1978) to 2.00 cases per 100,000 individuals (1985–1990).[4] Since that time, the incidence has remained steady at 1.94 cases per 100,000 individuals (2003–2008).[4] More recent data demonstrate that the incidence of gastric cardia cancers has been relatively stable, although an increase has been observed, from 2.4 cases per 100,000 individuals (1977–1981) to 2.9 cases per 100,000 individuals (2001–2006) in the White population.[2] The reasons for these temporal changes in incidence are unclear.

### Risk Factors

In the United States, gastric cancer ranks 15th in incidence among the major types of cancer. While the precise etiology is unknown, acknowledged risk factors for gastric cancer include:[5-8]

- Helicobacter pylori gastric infection.
- Advanced age.
- Male sex.
- Diet low in fruits and vegetables.
- Diet high in salted, smoked, or preserved foods.
- Chronic atrophic gastritis.
- Intestinal metaplasia.
- Pernicious anemia.
- Gastric adenomatous polyps.
- Family history of gastric cancer.
- Cigarette smoking.
- Ménétrier disease (giant hypertrophic gastritis).
- Epstein-Barr virus infection.
- Familial syndromes (including familial adenomatous polyposis).

### Prognosis and Survival

The prognosis of patients with gastric cancer is related to tumor extent and includes both nodal involvement and direct tumor extension beyond the gastric wall.[9,10] Tumor grade may also provide some prognostic information.[11]

In localized distal gastric cancer, more than 50% of patients can be cured. However, early-stage disease accounts for only 10% to 20% of all cases diagnosed in the United States. The remaining patients present with metastatic disease in either regional or distant sites. The 5-year overall survival rate in these patients ranges from almost no survival for patients with disseminated disease to almost 50% survival for patients with localized distal gastric cancers confined to resectable regional disease. Even with apparent localized disease, the 5-year survival rate of patients with proximal gastric cancer is only 10% to 15%. Although the treatment of patients with disseminated gastric cancer may result in palliation of symptoms and some prolongation of survival, long remissions are uncommon.

Gastrointestinal stromal tumors occur most commonly in the stomach. For more information, see Gastrointestinal Stromal Tumors Treatment.

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Anderson WF, Camargo MC, Fraumeni JF, et al.: Age-specific trends in incidence of noncardia gastric cancer in US adults. JAMA 303 (17): 1723-8, 2010.20442388
Blot WJ, Devesa SS, Kneller RW, et al.: Rising incidence of adenocarcinoma of the esophagus and gastric cardia. JAMA 265 (10): 1287-9, 1991.1995976 91140793
Buas MF, Vaughan TL: Epidemiology and risk factors for gastroesophageal junction tumors: understanding the rising incidence of this disease. Semin Radiat Oncol 23 (1): 3-9, 2013.23207041
Kurtz RC, Sherlock P: The diagnosis of gastric cancer. Semin Oncol 12 (1): 11-8, 1985.3975641 85142212
Scheiman JM, Cutler AF: Helicobacter pylori and gastric cancer. Am J Med 106 (2): 222-6, 1999.10230753 99245784
Fenoglio-Preiser CM, Noffsinger AE, Belli J, et al.: Pathologic and phenotypic features of gastric cancer. Semin Oncol 23 (3): 292-306, 1996.8658213 96242996
National Cancer Institute: SEER Cancer Stat Facts: Stomach Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/stomach.html). Last accessed February 21, 2025.
Siewert JR, Böttcher K, Stein HJ, et al.: Relevant prognostic factors in gastric cancer: ten-year results of the German Gastric Cancer Study. Ann Surg 228 (4): 449-61, 1998.9790335 99004995
Nakamura K, Ueyama T, Yao T, et al.: Pathology and prognosis of gastric carcinoma. Findings in 10,000 patients who underwent primary gastrectomy. Cancer 70 (5): 1030-7, 1992.1515980 92386379
Adachi Y, Yasuda K, Inomata M, et al.: Pathology and prognosis of gastric carcinoma: well versus poorly differentiated type. Cancer 89 (7): 1418-24, 2000.11013353 20469231

## Cellular Classification of Gastric Cancer

There are two major types of gastric adenocarcinoma:

- Intestinal.
- Diffuse.

Intestinal adenocarcinomas are well differentiated, and the cells tend to arrange themselves in tubular or glandular structures. The terms tubular, papillary, and mucinous are assigned to the various types of intestinal adenocarcinomas. Rarely, adenosquamous cancers can occur.

Diffuse adenocarcinomas are undifferentiated or poorly differentiated, and they lack a gland formation. Clinically, diffuse adenocarcinomas can give rise to infiltration of the gastric wall (i.e., linitis plastica).

Some tumors can have mixed features of intestinal and diffuse types.

## Stage Information for Gastric Cancer

### AJCC Prognostic Stage Groups and TNM Definitions

The American Joint Committee on Cancer (AJCC) has designated staging by TNM (tumor, node, metastasis) classification to define gastric cancer.[1]

Pathological (pTNM)

Table 1. Definitions of pTNM Stage 0^a^

Stage | TNM | Description
0 | Tis, N0, M0 | Tis = Carcinoma in situ: intraepithelial tumor without invasion of the lamina propria, high-grade dysplasia.
0 | Tis, N0, M0 | N0 = No regional lymph node metastasis.
0 | Tis, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; p = pathological.

^a^Reprinted with permission from AJCC: Stomach. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 203–20.

Table 2. Definitions of pTNM Stages IA and IB^a^

Stage | TNM | Description
IA | T1, N0, M0 | T1 = Tumor invades lamina propria, muscularis mucosae, or submucosa.
IA | T1, N0, M0 | –T1a = Tumor invades lamina propria or muscularis mucosae.
IA | T1, N0, M0 | –T1b = Tumor invades submucosa.
IA | T1, N0, M0 | N0 = No regional lymph node metastasis.
IA | T1, N0, M0 | M0 = No distant metastasis.
IB | T1, N1, M0 | T1 = Tumor invades lamina propria, muscularis mucosae, or submucosa.
IB | T1, N1, M0 | –T1a = Tumor invades lamina propria or muscularis mucosae.
IB | T1, N1, M0 | –T1b = Tumor invades submucosa.
IB | T1, N1, M0 | N1 = Metastases in 1 or 2 regional lymph nodes.
IB | T1, N1, M0 | M0 = No distant metastasis.
IB | T2, N0, M0 | T2 = Tumor invades muscularis propria.^b^
IB | T2, N0, M0 | N0 = No regional lymph node metastasis.
IB | T2, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; p = pathological.

^a^Reprinted with permission from AJCC: Stomach. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 203–20.

^b^A tumor may penetrate the muscularis propria with extension into the gastrocolic or gastrohepatic ligaments, or into the greater or lesser omentum, without perforation of the visceral peritoneum covering these structures. In this case, the tumor is classified T3. If there is perforation of the visceral peritoneum covering the gastric ligaments or the omentum, the tumor should be classified T4.

Table 3. Definitions of pTNM Stages IIA and IIB^a^

Stage | TNM | Description
IIA | T1, N2, M0 | T1 = Tumor invades lamina propria, muscularis mucosae, or submucosa.
IIA | T1, N2, M0 | –T1a = Tumor invades lamina propria or muscularis mucosae.
IIA | T1, N2, M0 | –T1b = Tumor invades submucosa.
IIA | T1, N2, M0 | N2 = Metastases in 3 to 6 regional lymph nodes.
IIA | T1, N2, M0 | M0 = No distant metastasis.
IIA | T2, N1, M0 | T2 = Tumor invades muscularis propria.^b^
IIA | T2, N1, M0 | N1 = Metastases in 1 or 2 regional lymph nodes.
IIA | T2, N1, M0 | M0 = No distant metastasis.
IIA | T3, N0, M0 | T3 = Tumor penetrates the subserosal connective tissue without invasion of the visceral peritoneum or adjacent structures.^c,d^
IIA | T3, N0, M0 | N0 = No regional lymph node metastasis.
IIA | T3, N0, M0 | M0 = No distant metastasis.
IIB | T1, N3a, M0 | T1 = Tumor invades lamina propria, muscularis mucosae, or submucosa.
IIB | T1, N3a, M0 | –T1a = Tumor invades lamina propria or muscularis mucosae.
IIB | T1, N3a, M0 | –T1b = Tumor invades submucosa.
IIB | T1, N3a, M0 | N3a = Metastasis in 7 to 15 regional lymph nodes.
IIB | T1, N3a, M0 | M0 = No distant metastasis.
IIB | T2, N2, M0 | T2 = Tumor invades muscularis propria.^b^
IIB | T2, N2, M0 | N2 = Metastases in 3 to 6 regional lymph nodes.
IIB | T2, N2, M0 | M0 = No distant metastasis.
IIB | T3, N1, M0 | T3 = Tumor penetrates the subserosal connective tissue without invasion of the visceral peritoneum or adjacent structures.^c,d^
IIB | T3, N1, M0 | N1 = Metastasis in 1or 2 regional lymph nodes.
IIB | T3, N1, M0 | M0 = No distant metastasis.
IIB | T4a, N0, M0 | T4a = Tumor invades serosa (visceral peritoneum).
IIB | T4a, N0, M0 | N0 = No regional lymph node metastasis.
IIB | T4a, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; p = pathological.

^a^Reprinted with permission from AJCC: Stomach. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 203–20.

^b^A tumor may penetrate the muscularis propria with extension into the gastrocolic or gastrohepatic ligaments, or into the greater or lesser omentum, without perforation of the visceral peritoneum covering these structures. In this case, the tumor is classified T3. If there is perforation of the visceral peritoneum covering the gastric ligaments or the omentum, the tumor should be classified T4.

^c^The adjacent structures of the stomach include the spleen, transverse colon, liver, diaphragm, pancreas, abdominal wall, adrenal gland, kidney, small intestine, and retroperitoneum.

^d^Intramural extension to the duodenum or esophagus is not considered invasion of an adjacent structure, but is classified using the depth of the greatest invasion in any of these sites.

Table 4. Definitions of pTNM Stages IIIA, IIIB, and IIIC^a^

Stage | TNM | Description
IIIA | T2, N3a, M0 | T2 = Tumor invades muscularis propria.^b^
IIIA | T2, N3a, M0 | N3a = Metastasis in 7 to 15 regional lymph nodes.
IIIA | T2, N3a, M0 | M0 = No distant metastasis.
IIIA | T3, N2, M0 | T3 = Tumor penetrates the subserosal connective tissue without invasion of the visceral peritoneum or adjacent structures.^c,d^
IIIA | T3, N2, M0 | N2 = Metastasis in 3 to 6 regional lymph nodes.
IIIA | T3, N2, M0 | M0 = No distant metastasis.
IIIA | T4a, N1, M0 | T4a = Tumor invades serosa (visceral peritoneum).
IIIA | T4a, N1, M0 | N1 = Metastasis in 1or 2 regional lymph nodes.
IIIA | T4a, N1, M0 | M0 = No distant metastasis.
IIIA | T4a, N2, M0 | T4a = Tumor invades serosa (visceral peritoneum).
IIIA | T4a, N2, M0 | N2 = Metastasis in 3 to 6 regional lymph nodes.
IIIA | T4a, N2, M0 | M0 = No distant metastasis.
IIIA | T4b, N0, M0 | T4b = Tumor invades adjacent structures/organs.^c,d^
IIIA | T4b, N0, M0 | N0 = No regional lymph node metastasis.
IIIA | T4b, N0, M0 | M0 = No distant metastasis.
IIIB | T1, N3b, M0 | T1 = Tumor invades lamina propria, muscularis mucosae, or submucosa.
IIIB | T1, N3b, M0 | N3b = Metastases in 16 or more regional lymph nodes.
IIIB | T1, N3b, M0 | M0 = No distant metastasis.
IIIB | T2, N3b, M0 | T2 = Tumor invades muscularis propria.^b^
IIIB | T2, N3b, M0 | N3b = Metastases in 16 or more regional lymph nodes.
IIIB | T2, N3b, M0 | M0 = No distant metastasis.
IIIB | T3, N3a, M0 | T3 = Tumor penetrates the subserosal connective tissue without invasion of the visceral peritoneum or adjacent structures.^c,d^
IIIB | T3, N3a, M0 | N3a = Metastasis in 7 to 15 regional lymph nodes.
IIIB | T3, N3a, M0 | M0 = No distant metastasis.
IIIB | T4a, N3a, M0 | T4a = Tumor invades serosa (visceral peritoneum).
IIIB | T4a, N3a, M0 | N3a = Metastasis in 7 to 15 regional lymph nodes.
IIIB | T4a, N3a, M0 | M0 = No distant metastasis.
IIIB | T4b, N1, M0 | T4b = Tumor invades adjacent structures/organs.^c,d^
IIIB | T4b, N1, M0 | N1 = Metastasis in 1or 2 regional lymph nodes.
IIIB | T4b, N1, M0 | M0 = No distant metastasis.
IIIB | T4b, N2, M0 | T4b = Tumor invades adjacent structures/organs.^c,d^
IIIB | T4b, N2, M0 | N2 = Metastasis in 3 to 6 regional lymph nodes.
IIIB | T4b, N2, M0 | M0 = No distant metastasis.
IIIC | T3, N3b, M0 | T3 = Tumor penetrates the subserosal connective tissue without invasion of the visceral peritoneum or adjacent structures.^cd^
IIIC | T3, N3b, M0 | N3b = Metastasis in 16 or more regional lymph nodes.
IIIC | T3, N3b, M0 | M0 = No distant metastasis.
IIIC | T4a, N3b, M0 | T4a = Tumor invades serosa (visceral peritoneum).
IIIC | T4a, N3b, M0 | N3b = Metastasis in 16 or more regional lymph nodes.
IIIC | T4a, N3b, M0 | M0 = No distant metastasis.
IIIC | T4b, N3a, M0 | T4b = Tumor invades adjacent structures/organs.^c,d^
IIIC | T4b, N3a, M0 | N3a = Metastasis in 7 to 15 regional lymph nodes.
IIIC | T4b, N3a, M0 | M0 = No distant metastasis.
IIIC | T4b, N3b, M0 | T4b = Tumor invades adjacent structures/organs.^c,d^
IIIC | T4b, N3b, M0 | N3b = Metastasis in 16 or more regional lymph nodes.
IIIC | T4b, N3b, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; p = pathological.

^a^Reprinted with permission from AJCC: Stomach. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 203–20.

^b^A tumor may penetrate the muscularis propria with extension into the gastrocolic or gastrohepatic ligaments, or into the greater or lesser omentum, without perforation of the visceral peritoneum covering these structures. In this case, the tumor is classified T3. If there is perforation of the visceral peritoneum covering the gastric ligaments or the omentum, the tumor should be classified T4.

^c^The adjacent structures of the stomach include the spleen, transverse colon, liver, diaphragm, pancreas, abdominal wall, adrenal gland, kidney, small intestine, and retroperitoneum.

^d^Intramural extension to the duodenum or esophagus is not considered invasion of an adjacent structure, but is classified using the depth of the greatest invasion in any of these sites.

Table 5. Definitions of pTNM Stage IV^a^

Stage | TNM | Description
IV | Any T, Any N, M1 | TX = Primary tumor cannot be assessed.
IV | Any T, Any N, M1 | T0 = No evidence of primary tumor.
IV | Any T, Any N, M1 | Tis = Carcinoma in situ: intraepithelial tumor without invasion of the lamina propria, high-grade dysplasia.
IV | Any T, Any N, M1 | T1 = Tumor invades lamina propria, muscularis mucosae, or submucosa.
IV | Any T, Any N, M1 | –T1a = Tumor invades lamina propria or muscularis mucosae.
IV | Any T, Any N, M1 | –T1b = Tumor invades submucosa.
IV | Any T, Any N, M1 | T2 = Tumor invades muscularis propria.^b^
IV | Any T, Any N, M1 | T3 = Tumor penetrates the subserosal connective tissue without invasion of the visceral peritoneum or adjacent structures.^c,d^
IV | Any T, Any N, M1 | T4 = Tumor invades the serosa (visceral peritoneum) or adjacent structures.^c,d^
IV | Any T, Any N, M1 | –T4a = Tumor invades serosa (visceral peritoneum).
IV | Any T, Any N, M1 | –T4b = Tumor invades adjacent structures/organs.
IV | Any T, Any N, M1 | NX = Regional lymph node(s) cannot be assessed.
IV | Any T, Any N, M1 | N0 = No regional lymph node metastasis.
IV | Any T, Any N, M1 | N1 = Metastases in 1 or 2 regional lymph nodes.
IV | Any T, Any N, M1 | N2 = Metastases in 3 to 6 regional lymph nodes.
IV | Any T, Any N, M1 | N3 = Metastases in ≥7 regional lymph nodes.
IV | Any T, Any N, M1 | –N3a = Metastases in 7 to 15 regional lymph nodes.
IV | Any T, Any N, M1 | –N3b = Metastases in 16 or more regional lymph nodes.
IV | Any T, Any N, M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; p = pathological.

^a^Reprinted with permission from AJCC: Stomach. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 203–20.

^b^A tumor may penetrate the muscularis propria with extension into the gastrocolic or gastrohepatic ligaments, or into the greater or lesser omentum, without perforation of the visceral peritoneum covering these structures. In this case, the tumor is classified T3. If there is perforation of the visceral peritoneum covering the gastric ligaments or the omentum, the tumor should be classified T4.

^c^The adjacent structures of the stomach include the spleen, transverse colon, liver, diaphragm, pancreas, abdominal wall, adrenal gland, kidney, small intestine, and retroperitoneum.

^d^Intramural extension to the duodenum or esophagus is not considered invasion of an adjacent structure, but is classified using the depth of the greatest invasion in any of these sites.

### References

Stomach. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 203–20.

## Treatment Option Overview for Gastric Cancer

The standard form of curative therapy for gastric cancer is radical surgery. However, the incidences of local failure in the tumor bed and regional lymph nodes, and distant failures via hematogenous or peritoneal routes, remain high.[1] As such, comprehensive staging and evaluation with a multidisciplinary team to determine roles of neoadjuvant, perioperative, and adjuvant combination chemotherapy, surgery, and external-beam radiation therapies should be considered.

Investigators in Europe evaluated the role of perioperative chemotherapy without radiation therapy.[2] Initially, in a randomized phase III trial (MRC-ST02 (https://www.cancer.gov/clinicaltrials/NCT00002615) [NCT00002615]), patients with stage II or higher adenocarcinoma of the stomach or of the lower third of the esophagus were assigned to receive three cycles of epirubicin, cisplatin, and continuous infusion fluorouracil (5-FU) (ECF) before and after surgery or to receive surgery alone. Compared with the surgery group, the perioperative chemotherapy group had a significantly higher overall survival (OS) (hazard ratio [HR]_death_, 0.75; 95% confidence interval [CI], 0.60–0.93; P = .009).[2][Level of evidence A1]

In addition, in the randomized phase III AIO-FLOT4 (https://www.cancer.gov/clinicaltrials/NCT01216644) trial (NCT01216644), patients with resectable disease that was stage T2 or higher and/or node positive received either perioperative epirubicin, cisplatin, and 5-FU or capecitabine (ECF/ECX) (three cycles before and after surgery) or perioperative docetaxel, oxaliplatin, and 5-FU/leucovorin (FLOT) (four 2-week cycles before and after surgery). OS was significantly prolonged from 35 months with ECF/ECX to 50 months with FLOT (HR, 0.77; 95% CI, 0.63–0.94; P = .012).[3]

In a phase III Intergroup trial (SWOG-9008 (https://www.cancer.gov/clinicaltrials/NCT01197118) [NCT01197118]), 559 patients with completely resected stage IB to stage IV (M0) adenocarcinoma of the stomach and gastroesophageal junction were randomly assigned to receive either surgery alone or surgery plus postoperative chemotherapy (5-FU and leucovorin) and concurrent radiation therapy (45 Gy). With a median follow-up of more than 10 years, a significant survival benefit was reported for patients who received adjuvant combined modality therapy.[4][Level of evidence A1] Median OS was 35 months for the adjuvant chemoradiation therapy group and 27 months for the surgery-alone arm (P = .0046). Median relapse-free survival was 27 months in the chemoradiation arm compared with 19 months in the surgery-alone arm (P < .001).

Gastroesophageal junction cancers may be treated like esophageal cancers and are best managed under the care of a multidisciplinary team. For more information, see Esophageal Cancer Treatment.

### Capecitabine and Fluorouracil Dosing

The DPYD gene encodes an enzyme that catabolizes pyrimidines and fluoropyrimidines, like capecitabine and fluorouracil. An estimated 1% to 2% of the population has germline pathogenic variants in DPYD, which lead to reduced DPD protein function and an accumulation of pyrimidines and fluoropyrimidines in the body.[5,6] Patients with the DPYD*2A variant who receive fluoropyrimidines may experience severe, life-threatening toxicities that are sometimes fatal. Many other DPYD variants have been identified, with a range of clinical effects.[5-7] Fluoropyrimidine avoidance or a dose reduction of 50% may be recommended based on the patient's DPYD genotype and number of functioning DPYD alleles.[8-10] DPYD genetic testing costs less than $200, but insurance coverage varies due to a lack of national guidelines.[11] In addition, testing may delay therapy by 2 weeks, which would not be advisable in urgent situations. This controversial issue requires further evaluation.[12]

### References

Gunderson LL, Sosin H: Adenocarcinoma of the stomach: areas of failure in a re-operation series (second or symptomatic look) clinicopathologic correlation and implications for adjuvant therapy. Int J Radiat Oncol Biol Phys 8 (1): 1-11, 1982.7061243 82141751
Cunningham D, Allum WH, Stenning SP, et al.: Perioperative chemotherapy versus surgery alone for resectable gastroesophageal cancer. N Engl J Med 355 (1): 11-20, 2006.16822992
Al-Batran SE, Homann N, Pauligk C, et al.: Perioperative chemotherapy with fluorouracil plus leucovorin, oxaliplatin, and docetaxel versus fluorouracil or capecitabine plus cisplatin and epirubicin for locally advanced, resectable gastric or gastro-oesophageal junction adenocarcinoma (FLOT4): a randomised, phase 2/3 trial. Lancet 393 (10184): 1948-1957, 2019.30982686
Smalley SR, Benedetti JK, Haller DG, et al.: Updated analysis of SWOG-directed intergroup study 0116: a phase III trial of adjuvant radiochemotherapy versus observation after curative gastric cancer resection. J Clin Oncol 30 (19): 2327-33, 2012.22585691
Sharma BB, Rai K, Blunt H, et al.: Pathogenic DPYD Variants and Treatment-Related Mortality in Patients Receiving Fluoropyrimidine Chemotherapy: A Systematic Review and Meta-Analysis. Oncologist 26 (12): 1008-1016, 2021.34506675
Lam SW, Guchelaar HJ, Boven E: The role of pharmacogenetics in capecitabine efficacy and toxicity. Cancer Treat Rev 50: 9-22, 2016.27569869
Shakeel F, Fang F, Kwon JW, et al.: Patients carrying DPYD variant alleles have increased risk of severe toxicity and related treatment modifications during fluoropyrimidine chemotherapy. Pharmacogenomics 22 (3): 145-155, 2021.33410339
Amstutz U, Henricks LM, Offer SM, et al.: Clinical Pharmacogenetics Implementation Consortium (CPIC) Guideline for Dihydropyrimidine Dehydrogenase Genotype and Fluoropyrimidine Dosing: 2017 Update. Clin Pharmacol Ther 103 (2): 210-216, 2018.29152729
Henricks LM, Lunenburg CATC, de Man FM, et al.: DPYD genotype-guided dose individualisation of fluoropyrimidine therapy in patients with cancer: a prospective safety analysis. Lancet Oncol 19 (11): 1459-1467, 2018.30348537
Lau-Min KS, Varughese LA, Nelson MN, et al.: Preemptive pharmacogenetic testing to guide chemotherapy dosing in patients with gastrointestinal malignancies: a qualitative study of barriers to implementation. BMC Cancer 22 (1): 47, 2022.34996412
Brooks GA, Tapp S, Daly AT, et al.: Cost-effectiveness of DPYD Genotyping Prior to Fluoropyrimidine-based Adjuvant Chemotherapy for Colon Cancer. Clin Colorectal Cancer 21 (3): e189-e195, 2022.35668003
Baker SD, Bates SE, Brooks GA, et al.: DPYD Testing: Time to Put Patient Safety First. J Clin Oncol 41 (15): 2701-2705, 2023.36821823

## Treatment of Stage 0 Gastric Cancer

### Treatment Options for Stage 0 Gastric Cancer

Treatment options for stage 0 gastric cancer include:

1. Surgery.
2. Endoscopic mucosal resection (EMR).

#### Surgery

Stage 0 is gastric cancer confined to mucosa. Experience in Japan, where stage 0 is diagnosed frequently, indicates that more than 90% of patients treated by gastrectomy with lymphadenectomy survive beyond 5 years. An American series confirmed these results.[1]

#### Endoscopic mucosal resection (EMR)

EMR has been studied in Japan and throughout Asia in patients with early-stage tumors with good-risk features (Tis or T1a, diameter ≤2 cm, predominantly differentiated type, without ulcerative findings) that have a lower risk of nodal metastasis. Intramucosal tumors have a lower risk of nodal metastasis than submucosal tumors.[2] Careful patient selection according to risk criteria, treatment with an experienced endoscopist, and close surveillance should be considered.

Evidence (EMR):

1. A prospective trial of EMR included 445 patients with intramucosal carcinoma (a total of 479 tumors) treated in Tokyo between 1987 and 1998. Complete resection was recommended for patients with evidence of submucosal invasion, blood vessel involvement, and/or positive margins.[3][Level of evidence C2]
  - Of the 405 patients with intramucosal disease, 278 underwent complete resection, with 2% local recurrence treated with curative intent and 100% disease-free survival at a median follow-up of 38 months.
  - In those with resections that were incomplete or not evaluable, 18 of 127 patients had a local recurrence and underwent curative surgery.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Green PH, O'Toole KM, Slonim D, et al.: Increasing incidence and excellent survival of patients with early gastric cancer: experience in a United States medical center. Am J Med 85 (5): 658-61, 1988.3189369 89047494
Japanese Gastric Cancer Association: Japanese gastric cancer treatment guidelines 2014 (ver. 4). Gastric Cancer 20 (1): 1-19, 2017.27342689
Ono H, Kondo H, Gotoda T, et al.: Endoscopic mucosal resection for treatment of early gastric cancer. Gut 48 (2): 225-9, 2001.11156645

## Treatment of Stage I Gastric Cancer

### Treatment Options for Stage I Gastric Cancer

Treatment options for stage I gastric cancer include:

1. Surgical resection with one of the following procedures:
  - Distal subtotal gastrectomy (if the lesion is not in the fundus or at the cardioesophageal junction).
  - Proximal subtotal gastrectomy or total gastrectomy, both with distal esophagectomy (if the lesion involves the cardia). These tumors often involve the submucosal lymphatics of the esophagus.
  - Total gastrectomy (if the tumor involves the stomach diffusely or arises in the body of the stomach and extends to within 6 cm of the cardia or distal antrum).
  Regional lymphadenectomy is recommended with all of the above procedures. Splenectomy is not routinely performed.[1]
2. Endoscopic mucosal resection (EMR) for select patients with stage IA gastric cancer.
3. Postoperative chemoradiation therapy or perioperative chemotherapy for patients with node-positive (T1 N1) and muscle-invasive (T2 N0) disease.[2,3]
4. Neoadjuvant chemoradiation (under clinical evaluation).[4]

#### Surgical resection

Surgical resection including regional lymphadenectomy is the treatment of choice for patients with stage I gastric cancer.[1] If the lesion is not in the cardioesophageal junction and does not diffusely involve the stomach, subtotal gastrectomy is the procedure of choice, because it has demonstrated equivalent survival when compared with total gastrectomy and is associated with decreased morbidity.[5][Level of evidence A1] When the lesion involves the cardia, proximal subtotal gastrectomy or total gastrectomy (including a sufficient length of esophagus) may be performed with curative intent. If the lesion diffusely involves the stomach, total gastrectomy is required. At a minimum, surgical resection includes greater and lesser curvature perigastric regional lymph nodes. In patients with stage I gastric cancer, perigastric lymph nodes may contain cancer.

#### Endoscopic mucosal resection (EMR)

EMR has been studied in Japan and throughout Asia in patients with early-stage tumors with good-risk features (Tis or T1a, diameter ≤2 cm, predominantly differentiated type, without ulcerative findings) that have a lower risk of nodal metastasis. Intramucosal tumors have a lower risk of nodal metastasis than submucosal tumors.[6] Careful patient selection according to risk criteria, treatment with an experienced endoscopist, and close surveillance should be considered.

Evidence (EMR):

1. A prospective trial of EMR included 445 patients with intramucosal carcinoma (a total of 479 tumors) treated in Tokyo between 1987 and 1998. Complete resection was recommended for patients with evidence of submucosal invasion, blood vessel involvement, and/or positive margins.[7][Level of evidence C2]
  - Of the 405 patients with intramucosal disease, 278 underwent complete resection, with 2% local recurrence treated with curative intent and 100% disease-free survival at a median follow-up of 38 months.
  - In those with resections that were incomplete or not evaluable, 18 of 127 patients had a local recurrence and underwent curative surgery.

#### Postoperative chemoradiation therapy

Patients with node-positive (T1 N1) and muscle-invasive (T2 N0) disease may consider postoperative chemoradiation therapy.

Evidence (postoperative chemoradiation therapy):

1. A prospective, multi-institution, phase III trial (SWOG-9008 (https://www.cancer.gov/clinicaltrials/NCT01197118) [NCT01197118]) evaluated postoperative combined chemoradiation therapy versus surgery alone in 559 patients with completely resected stage IB to stage IV (M0) adenocarcinoma of the stomach and gastroesophageal junction. There was a significant survival benefit with adjuvant combined modality therapy.[2][Level of evidence A1]
  - With more than 10 years of follow-up, median survival was 35 months for the adjuvant chemoradiation therapy group and 27 months for the surgery-alone arm (P = .0046).
  - Median relapse-free survival was 27 months in the chemoradiation arm compared with 19 months in the surgery-alone arm (P < .001). Improvement was primarily seen for locoregional recurrence risk (improvement from 47% for surgery vs. 29% for chemoradiation).[2] However, only 36 patients in the trial had stage IB tumors (18 patients in each arm).[8]
  Because the prognosis is relatively favorable for patients with completely resected stage IB disease, the effectiveness of adjuvant chemoradiation therapy for this group is less clear.

#### Perioperative chemotherapy

Investigators in Europe evaluated the role of perioperative chemotherapy without radiation therapy.[9]

Evidence (perioperative chemotherapy):

1. In the randomized phase III AIO-FLOT4 (https://www.cancer.gov/clinicaltrials/NCT01216644) trial (NCT01216644), 716 patients with stage IB to stage III resectable gastric or gastroesophageal adenocarcinoma were randomly assigned to receive either perioperative chemotherapy with docetaxel, oxaliplatin, and fluorouracil (5-FU)/leucovorin (FLOT); or epirubicin, cisplatin, and 5-FU or capecitabine (ECF/ECX).[3][Level of evidence A1]
  - Median overall survival was 50 months with FLOT and 35 months with ECF/ECX (hazard ratio, 0.77; 95% confidence interval, 0.63–0.94; P = .012).
  - Margin-free resection in the FLOT group was 85% versus 78% in the ECF/ECX group (P = .0162).
  - Toxicity rates were similar between groups (26% required hospitalizations in the ECF/ECX group and 25% in the FLOT group). However, types of side effects differed, with increased nausea, thromboembolic events, and anemia in the ECF/ECX group versus higher rates of grade 3/4 infections, neutropenia, diarrhea, and neuropathy in the FLOT group.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Brennan MF, Karpeh MS: Surgery for gastric cancer: the American view. Semin Oncol 23 (3): 352-9, 1996.8658219 96243002
Smalley SR, Benedetti JK, Haller DG, et al.: Updated analysis of SWOG-directed intergroup study 0116: a phase III trial of adjuvant radiochemotherapy versus observation after curative gastric cancer resection. J Clin Oncol 30 (19): 2327-33, 2012.22585691
Al-Batran SE, Homann N, Pauligk C, et al.: Perioperative chemotherapy with fluorouracil plus leucovorin, oxaliplatin, and docetaxel versus fluorouracil or capecitabine plus cisplatin and epirubicin for locally advanced, resectable gastric or gastro-oesophageal junction adenocarcinoma (FLOT4): a randomised, phase 2/3 trial. Lancet 393 (10184): 1948-1957, 2019.30982686
Ajani JA, Winter K, Okawara GS, et al.: Phase II trial of preoperative chemoradiation in patients with localized gastric adenocarcinoma (RTOG 9904): quality of combined modality therapy and pathologic response. J Clin Oncol 24 (24): 3953-8, 2006.16921048
Bozzetti F, Marubini E, Bonfanti G, et al.: Subtotal versus total gastrectomy for gastric cancer: five-year survival rates in a multicenter randomized Italian trial. Italian Gastrointestinal Tumor Study Group. Ann Surg 230 (2): 170-8, 1999.10450730 99377939
Japanese Gastric Cancer Association: Japanese gastric cancer treatment guidelines 2014 (ver. 4). Gastric Cancer 20 (1): 1-19, 2017.27342689
Ono H, Kondo H, Gotoda T, et al.: Endoscopic mucosal resection for treatment of early gastric cancer. Gut 48 (2): 225-9, 2001.11156645
Kelsen DP: Postoperative adjuvant chemoradiation therapy for patients with resected gastric cancer: intergroup 116. J Clin Oncol 18 (21 Suppl): 32S-4S, 2000.11060322 20515696
Cunningham D, Allum WH, Stenning SP, et al.: Perioperative chemotherapy versus surgery alone for resectable gastroesophageal cancer. N Engl J Med 355 (1): 11-20, 2006.16822992

## Treatment of Stages II and III Gastric Cancer

### Treatment Options for Stages II and III Gastric Cancer

Treatment options for stage II gastric cancer and stage III gastric cancer include:

1. Surgical resection (after discussion with a multidisciplinary team regarding the role of perioperative and adjuvant therapy) may include one of the following procedures:
  - Distal subtotal gastrectomy (if the lesion is not in the fundus or at the cardioesophageal junction).
  - Proximal subtotal gastrectomy or total gastrectomy (if the lesion involves the cardia).
  - Total gastrectomy (if the tumor involves the stomach diffusely or arises in the body of the stomach and extends to within 6 cm of the cardia).
  Regional lymphadenectomy is recommended with all of the above procedures. Splenectomy is not routinely performed.[1]
2. Perioperative chemotherapy.[2]
3. Postoperative (adjuvant) chemoradiation therapy.[3]
4. Postoperative (adjuvant) chemotherapy.
5. Neoadjuvant chemoradiation therapy (under clinical evaluation).[4]
6. Perioperative chemotherapy and immunotherapy regimens (under clinical evaluation).

No randomized trials of adjuvant chemoradiation versus perioperative chemotherapy have been undertaken.

All newly diagnosed patients with stages II and III gastric cancer should consider clinical trials.

#### Surgical resection

Because of the high risk of locoregional and distant recurrence, perioperative and postoperative therapy should be considered in addition to surgery.

Surgical resection with regional lymphadenectomy is the treatment of choice for patients with stages II and III gastric cancer; all eligible patients undergo surgery.[1] If the lesion is not in the cardioesophageal junction and does not diffusely involve the stomach, subtotal gastrectomy is the procedure of choice. When the lesion involves the cardia, proximal subtotal gastrectomy or total gastrectomy may be performed with curative intent. If the lesion diffusely involves the stomach, total gastrectomy and appropriate lymph node resection may be required. The role of extended lymph node (D2) dissection is uncertain [5] and in some series is associated with increased morbidity.[6,7] As many as 15% of selected stage III patients can be cured by surgery alone, particularly if lymph node involvement is minimal (<7 lymph nodes).

#### Perioperative chemotherapy

Investigators in Europe evaluated the role of perioperative chemotherapy without radiation therapy.[2]

Evidence (perioperative chemotherapy):

1. In the randomized phase III AIO-FLOT4 (https://www.cancer.gov/clinicaltrials/NCT01216644) trial (NCT01216644), 716 patients with stage IB to stage III resectable gastric or gastroesophageal adenocarcinoma were randomly assigned to receive either perioperative chemotherapy with docetaxel, oxaliplatin, and fluorouracil (5-FU)/leucovorin (FLOT) or epirubicin, cisplatin, and 5-FU or capecitabine (ECF/ECX).[8][Level of evidence A1]
  - Median overall survival (OS) was 50 months with FLOT and 35 months with ECF/ECX (hazard ratio [HR], 0.77; 95% confidence interval [CI], 0.63–0.94; P = .012).
  - Margin-free resection in the FLOT group was 85% versus 78% in the ECF/ECX group (P = .0162).
  - Toxicity rates were similar between groups (26% required hospitalizations in the ECF/ECX group and 25% in the FLOT group). However, types of side effects differed, with increased nausea, thromboembolic events, and anemia in the ECF/ECX group versus higher rates of grade 3/4 infections, neutropenia, diarrhea, and neuropathy in the FLOT group.
2. In the randomized phase III MAGIC (https://www.cancer.gov/clinicaltrials/NCT00002615) trial (NCT00002615), patients with stage II or higher adenocarcinoma of the stomach or of the lower third of the esophagus were assigned to receive three cycles of epirubicin, cisplatin, and continuous infusion 5-FU (ECF) before and after surgery or to receive surgery alone.[2]
  - Compared with the surgery group, the perioperative chemotherapy group had a significantly higher likelihood of progression-free survival (HR_progression_, 0.66; 95% CI, 0.53–0.81; P < .001) and of OS (HR_death_, 0.75; 95% CI, 0.60–0.93; P = .009).
  - The 5-year OS rate was 36.3% (95% CI, 29.5%‒43.0%) for the perioperative chemotherapy group and 23% (95% CI, 16.6%‒29.4%) for the surgery group.[2][Level of evidence A1]

#### Postoperative (adjuvant) chemoradiation therapy

Patients with stages II and III gastric cancer who have not received neoadjuvant therapy may consider postoperative chemoradiation therapy.

Evidence (postoperative [adjuvant] chemoradiation therapy):

1. A prospective, multi-institution, phase III trial (SWOG-9008 (https://www.cancer.gov/clinicaltrials/NCT01197118) [NCT01197118]) evaluated postoperative combined chemoradiation therapy compared with surgery alone in 559 patients with completely resected stage IB to stage IV (M0) adenocarcinoma of the stomach and gastroesophageal junction. Investigators reported a significant survival benefit for patients who received adjuvant combined-modality therapy.[3][Level of evidence A1]
  - With more than 10 years of follow-up, median survival was 35 months for the adjuvant chemoradiation therapy arm and 27 months for the surgery-alone arm (P = .0046).
  - Median relapse-free survival was 27 months in the chemoradiation arm compared with 19 months in the surgery-alone arm (P < .001). Improvement was primarily seen for locoregional recurrence risk (improvement from 47% for surgery vs. 29% for chemoradiation).[3] However, only 36 patients in the trial had stage IB tumors (18 patients in each arm).[9]
2. Attempts to evaluate the role of more intensive chemotherapy regimens in combination with radiation in the Cancer and Leukemia Group B study (CALGB-80101 (https://www.cancer.gov/clinicaltrials/NCT00052910) [NCT00052910]) demonstrated no survival benefit. The 546 patients who had undergone curative resection of stage IB to stage IV (M0) gastric or gastroesophageal junction adenocarcinoma received postoperative 5-FU with leucovorin before and after radiation or postoperative ECF before and after combined radiation therapy.[10]
  - The 5-year OS rate was 44% in both arms.
3. In a phase III Dutch trial (CRITICS (https://www.cancer.gov/clinicaltrials/NCT00407186) [NCT00407186]), 788 patients with stage IB to stage IVA gastric/gastroesophageal junction adenocarcinoma received preoperative chemotherapy and surgery, and then were randomly assigned to receive postoperative chemotherapy or chemoradiotherapy.[11] Adjuvant chemoradiation did not improve survival in those who received neoadjuvant chemotherapy.
  - Median OS was 43 months in the chemotherapy arm and 37 months in the chemoradiotherapy group (95% CI, 0.84–1.22; P = .90).

#### Postoperative (adjuvant) chemotherapy

Investigators in Europe evaluated the role of postoperative chemotherapy without radiation therapy.[2]

Evidence (postoperative [adjuvant] chemotherapy):

1. Japanese investigators randomly assigned 1,059 patients with stage II or III gastric cancer who had undergone a D2 gastrectomy to receive either 1 year of S-1, an oral fluoropyrimidine not available in the United States, or follow-up after surgery alone.[12] Patients were randomly assigned in a 1:1 fashion.
  - The 3-year OS rate was 80.1% in the S-1 group and 70.1% in the surgery-only group. The HR_death_ in the S-1 group, as compared with the surgery-only group, was 0.68 (95% CI, 0.52–0.87; P = .003).[12][Level of evidence A1]
2. Investigators in Asia evaluated the role of capecitabine/oxaliplatin as adjuvant therapy after gastric cancer resection. In the CLASSIC (https://www.cancer.gov/clinicaltrials/NCT00411229) trial (NCT00411229), 37 centers in South Korea, China, and Taiwan randomly assigned 1,035 patients with stages IIA, IIB, IIIA, or IIIB gastric cancer who had undergone a curative D2 gastrectomy to receive either adjuvant chemotherapy (eight 3-week cycles of capecitabine plus oxaliplatin) or follow-up alone after surgery.[13]
  - The 3-year disease-free survival rate was 74% in the chemotherapy group and 59% in the surgery-alone group (HR, 0.56; 95% CI, 0.44–0.72; P < .0001).
  - The 3-year OS rate was 83% in the chemotherapy group and 78% in the surgery-alone group (HR, 0.72; 95% CI, 0.52–1.00; P = .0493).[13][Level of evidence A1]
  - Further follow-up is anticipated.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Brennan MF, Karpeh MS: Surgery for gastric cancer: the American view. Semin Oncol 23 (3): 352-9, 1996.8658219 96243002
Cunningham D, Allum WH, Stenning SP, et al.: Perioperative chemotherapy versus surgery alone for resectable gastroesophageal cancer. N Engl J Med 355 (1): 11-20, 2006.16822992
Smalley SR, Benedetti JK, Haller DG, et al.: Updated analysis of SWOG-directed intergroup study 0116: a phase III trial of adjuvant radiochemotherapy versus observation after curative gastric cancer resection. J Clin Oncol 30 (19): 2327-33, 2012.22585691
Ajani JA, Winter K, Okawara GS, et al.: Phase II trial of preoperative chemoradiation in patients with localized gastric adenocarcinoma (RTOG 9904): quality of combined modality therapy and pathologic response. J Clin Oncol 24 (24): 3953-8, 2006.16921048
Kitamura K, Yamaguchi T, Sawai K, et al.: Chronologic changes in the clinicopathologic findings and survival of gastric cancer patients. J Clin Oncol 15 (12): 3471-80, 1997.9396400 98057073
Bonenkamp JJ, Songun I, Hermans J, et al.: Randomised comparison of morbidity after D1 and D2 dissection for gastric cancer in 996 Dutch patients. Lancet 345 (8952): 745-8, 1995.7891484 95198460
Cuschieri A, Fayers P, Fielding J, et al.: Postoperative morbidity and mortality after D1 and D2 resections for gastric cancer: preliminary results of the MRC randomised controlled surgical trial.The Surgical Cooperative Group. Lancet 347 (9007): 995-9, 1996.8606613 96185253
Al-Batran SE, Homann N, Pauligk C, et al.: Perioperative chemotherapy with fluorouracil plus leucovorin, oxaliplatin, and docetaxel versus fluorouracil or capecitabine plus cisplatin and epirubicin for locally advanced, resectable gastric or gastro-oesophageal junction adenocarcinoma (FLOT4): a randomised, phase 2/3 trial. Lancet 393 (10184): 1948-1957, 2019.30982686
Kelsen DP: Postoperative adjuvant chemoradiation therapy for patients with resected gastric cancer: intergroup 116. J Clin Oncol 18 (21 Suppl): 32S-4S, 2000.11060322 20515696
Fuchs CS, Niedzwiecki D, Mamon HJ, et al.: Adjuvant Chemoradiotherapy With Epirubicin, Cisplatin, and Fluorouracil Compared With Adjuvant Chemoradiotherapy With Fluorouracil and Leucovorin After Curative Resection of Gastric Cancer: Results From CALGB 80101 (Alliance). J Clin Oncol 35 (32): 3671-3677, 2017.28976791
Cats A, Jansen EPM, van Grieken NCT, et al.: Chemotherapy versus chemoradiotherapy after surgery and preoperative chemotherapy for resectable gastric cancer (CRITICS): an international, open-label, randomised phase 3 trial. Lancet Oncol 19 (5): 616-628, 2018.29650363
Sakuramoto S, Sasako M, Yamaguchi T, et al.: Adjuvant chemotherapy for gastric cancer with S-1, an oral fluoropyrimidine. N Engl J Med 357 (18): 1810-20, 2007.17978289
Bang YJ, Kim YW, Yang HK, et al.: Adjuvant capecitabine and oxaliplatin for gastric cancer after D2 gastrectomy (CLASSIC): a phase 3 open-label, randomised controlled trial. Lancet 379 (9813): 315-21, 2012.22226517

## Treatment of Stage IV, Inoperable, and Recurrent Gastric Cancer

### Treatment Options for Stage IV, Inoperable, and Recurrent Gastric Cancer

Treatment options for stage IV, inoperable, and recurrent gastric cancer, including patients with medically or surgically unresectable disease, include a combination of cytotoxic therapies, targeted therapies, immunotherapies, and palliative locoregional therapies.

Patients with metastatic gastric adenocarcinoma should consider undergoing testing for HER2 amplification, defective mismatch repair (dMMR) (immunohistochemistry [IHC] staining), or microsatellite instability (MSI) (polymerase chain reaction), along with programmed death ligand 1 (PD-L1) combined positive score (CPS score in the United States).

1. First-line palliative systemic therapy for patients with HER2-negative tumors.
  a. Palliative chemotherapy with or without immunotherapy.
    - Chemotherapy with immunotherapy: fluorouracil (5-FU) or capecitabine combined with oxaliplatin and nivolumab.
  b. Monoclonal antibody therapy with chemotherapy for patients with CLDN18.2-positive tumors.
    - Zolbetuximab plus CAPOX (capecitabine and oxaliplatin) or mFOLFOX6 (modified leucovorin [or levoleucovorin], 5-FU, and oxaliplatin).[1,2]
  c. Triplet regimens.
    - 5-FU combined with either epirubicin and cisplatin, etoposide and leucovorin, doxorubicin and methotrexate, leucovorin and irinotecan, or docetaxel and cisplatin or oxaliplatin.[3-9]
  d. Doublet regimens.
    - A taxane (docetaxel or paclitaxel) and either cisplatin or carboplatin.
    - 5-FU and cisplatin.
    - CAPOX.[10]
  e. Single agents.
    - 5-FU or capecitabine.[11,12]
    - A taxane (either docetaxel or paclitaxel).
2. First-line palliative systemic therapy for patients with HER2-positive tumors (3+ on IHC or 2+ on IHC with a positive fluorescence in situ hybridization [FISH]).
  a. Immunotherapy with chemotherapy.
    - Nivolumab with chemotherapy.
    - Trastuzumab with chemotherapy.
3. Second-line palliative systemic therapy.
  a. Palliative chemotherapy.
  b. Ramucirumab with or without chemotherapy.
  c. Pembrolizumab for patients with dMMR or MSI-high (MSI-H) tumors.
  d. Trastuzumab deruxtecan for patients with HER2-positive tumors (3+ on IHC or 2+ on IHC with a positive FISH).
4. Third-line palliative systemic therapy.
  a. Trifluridine and tipiracil.
5. Endoluminal laser therapy, endoluminal stent placement, or gastrojejunostomy may be helpful to patients with gastric obstruction.[13]
6. Palliative radiation therapy may alleviate bleeding, pain, and obstruction.
7. Palliative resection is reserved for patients with continued bleeding or obstruction.
8. Regorafenib with nivolumab (under clinical evaluation).
9. Cytoreductive surgery and hyperthermic intraperitoneal chemotherapy (under clinical evaluation).

Treatment with poly (ADP-ribose) polymerase (PARP) inhibitors and hepatocyte growth factor inhibitors have not shown efficacy at this time, but combination studies are under way.

#### First-line palliative systemic therapy for patients with HER2-negative tumors

##### Palliative chemotherapy with or without immunotherapy

Standard chemotherapy versus best supportive care for patients with metastatic gastric cancer has been tested in several clinical trials, and there is general agreement that patients who receive chemotherapy live for several months longer on average than patients who receive supportive care.[14-16][Level of evidence A1] During the last 20 years, multiple randomized studies evaluating different treatment regimens (monotherapy vs. combination [doublet and triplet] chemotherapy) have been performed in patients with metastatic gastric cancer with no clear consensus as to the best management approach. A meta-analysis of these studies demonstrated a hazard ratio (HR) of 0.83 for overall survival (OS) (95% confidence interval [CI], 0.74–0.93) in favor of combination chemotherapy.[17] The addition of immune checkpoint inhibitors to oxaliplatin-based chemotherapy has shown further OS benefit.

Evidence (palliative chemotherapy):

1. Of all the combination regimens, epirubicin, cisplatin, and 5-FU (ECF) is often considered the reference standard in the United States and Europe. In one European trial, 274 patients with metastatic esophagogastric cancer were randomly assigned to receive either ECF or 5-FU, doxorubicin, and methotrexate (FAMTX).[18]
  - The group who received ECF had a significantly longer median survival (8.9 vs. 5.7 months, P = .0009) than the FAMTX group.[18][Level of evidence A1]
2. In a second trial that compared ECF with mitomycin, cisplatin, and 5-FU (MCF), there was no statistically significant difference in median survival (9.4 vs. 8.7 months, P = .315).[4][Level of evidence A1]
3. Oxaliplatin or capecitabine are often substituted for cisplatin and 5-FU within the ECF regimen on the basis of results from the REAL-2 trial (ISRCTN51678883 (http://www.isrctn.com/ISRCTN51678883)).[10] This randomized trial of 1,002 patients with advanced esophageal, gastroesophageal junction, or gastric cancer utilized a 2 × 2 design.
  - The trial demonstrated noninferior median OS in patients treated with capecitabine rather than 5-FU (HR_death_, 0.86; 95% CI, 0.82–0.99) and in patients treated with oxaliplatin in place of cisplatin (HR_death_, 0.92; 95% CI, 0.80–1.10)
4. An international collaboration of investigators randomly assigned 445 patients with metastatic gastric cancer to receive docetaxel, cisplatin, and 5-FU (DCF) or cisplatin and 5-FU.[19] Time-to-treatment progression (TTP) was the primary end point.
  - Patients who received DCF experienced a significantly longer TTP (5.6 months; 95% CI, 4.9–5.9; vs. 3.7 months; 95% CI, 3.4–4.5; HR, 1.47; 95% CI, 1.19–1.82; log-rank P < .001; risk reduction, 32%).
  - The median OS was significantly longer for patients who received DCF compared with patients who received cisplatin and 5-FU (9.2 months; 95% CI, 8.4–10.6; vs. 8.6 months; 95% CI, 7.2–9.5; HR, 1.29; 95% CI, 1.0–1.6; log-rank P = .02; risk reduction, 23%).[19][Level of evidence A1]
  - The toxicity rates were high in both arms.[20]
  - Febrile neutropenia was more common in patients who received DCF (29% vs. 12%). The death rate was 10.4% in patients who received DCF and 9.4% in patients who received cisplatin and 5-FU.
5. It is unclear if cisplatin and 5-FU should be considered as an index regimen for the treatment of patients with metastatic gastric cancer.[20] The results of a study that randomly assigned 245 patients with metastatic gastric cancer to receive cisplatin and 5-FU, FAMTX, or etoposide, leucovorin, and 5-FU (ELF) demonstrated no significant difference in response rate, progression-free survival (PFS), or OS between the arms.[5]
  - Grades 3 and 4 neutropenia occurred in 35% to 43% of patients on all arms, but severe nausea and vomiting was more common in patients in the cisplatin-and-5-FU arm and occurred in 26% of those patients.[5][Level of evidence B3]

Phase II studies that evaluated irinotecan-based or oxaliplatin-based regimens demonstrated similar response rates and TTP to those reported in trials using ECF or cisplatin and 5-FU, but the former regimen may be less toxic.[21-26] There are conflicting data regarding relative efficacy of any one regimen.

##### Monoclonal antibody therapy with chemotherapy for patients with CLDN18.2-positive tumors

###### Zolbetuximab plus CAPOX or mFOLFOX6

Two randomized trials tested the addition of zolbetuximab to either CAPOX or mFOLFOX6 in patients with CLDN18.2-positive, HER2-negative metastatic gastroesophageal or gastric adenocarcinoma.[1,2]

Evidence (zolbetuximab with chemotherapy):

1. In the phase III GLOW (https://www.cancer.gov/clinicaltrials/NCT03653507) trial (NCT03653507), 507 patients were randomly assigned to receive CAPOX and either zolbetuximab or placebo.[1]
  - The median PFS was 8.21 months in the zolbetuximab arm and 6.80 months in the placebo arm (HR, 0.687; 95% CI, 0.544–0.866; P = .0007). The median OS was 14.39 months in the zolbetuximab arm and 12.16 months in the placebo arm (HR, 0.771; 95% CI, 0.615–0.965; P = .0118).[1][Level of evidence B1]
2. The phase III SPOTLIGHT (https://www.cancer.gov/clinicaltrials/NCT03504397) trial (NCT03504397) included 565 patients with CLDN18.2-positive, HER2-negative metastatic gastroesophageal or gastric adenocarcinoma. Patients were randomly assigned to receive mFOLFOX6 and either zolbetuximab or placebo.[2]
  - The median PFS was 10.61 months (95% CI, 8.90–12.48) in the zolbetuximab arm and 8.67 months (95% CI, 8.21–10.28) in the placebo arm (HR, 0.75; 95% CI, 0.60–0.94; P = .0066). Patients who received zolbetuximab had a reduced risk of death (HR, 0.75; 95% CI, 0.60–0.94; P = .0053).[2][Level of evidence A1]

A subsequent combined analysis of the SPOTLIGHT and GLOW trials showed that the addition of zolbetuximab did not negatively affect health-related quality of life.[27]

#### First-line palliative systemic therapy for patients with HER2-positive tumors (3+ on IHC or 2+ on IHC with a positive FISH)

##### Immunotherapy with chemotherapy

###### Nivolumab with chemotherapy

Nivolumab may be considered in combination with chemotherapy for patients with advanced or metastatic gastric cancer regardless of PD-L1 CPS status.[28]

Evidence (nivolumab with chemotherapy):

1. In a randomized, open-label, international, phase III study (CheckMate-649 (https://www.cancer.gov/clinicaltrials/NCT02872116) [NCT02872116]), patients with HER2-negative gastric or gastroesophageal junction adenocarcinomas were randomly assigned 1:1:1 to receive either nivolumab with chemotherapy (nivolumab 360 mg with CAPOX every 3 weeks or nivolumab 240 mg with leucovorin, 5-FU, and oxaliplatin [FOLFOX] every 2 weeks), chemotherapy alone (CAPOX every 3 weeks or FOLFOX every 2 weeks), or nivolumab 1 mg/kg and ipilimumab 3 mg/kg every 3 weeks × 4 (followed by maintenance nivolumab). The trial randomly assigned 1,581 patients (including 955 with PD-L1 CPS ≥5) to the chemotherapy-plus-nivolumab arm (n = 789; n = 473 with PD-L1 CPS ≥5) or the chemotherapy-alone arm (n = 792; n = 482 with PD-L1 CPS ≥5).[28]
  - For all patients (regardless of PD-L1 status), the median OS was 14.0 months (95% CI, 12.6–15.0) in the nivolumab-plus-chemotherapy arm compared with 11.3 months (95 % CI, 10.6–12.3) in the chemotherapy-alone arm (HR, 0.77; 99.3% CI, 0.64–0.92; P < .0001).
  - Patients with tumors with PD-L1 CPS greater than 5 had a median OS of 14.4 months (95% CI, 13.1–16.2) in the nivolumab-plus-chemotherapy arm compared with 11.1 months (95% CI, 10.0−12.1) in the chemotherapy-alone arm (HR, 0.71; 98.4% CI, 0.59–0.86; P = .0001).
  - Grades 3 and 4 adverse events occurred in 462 patients in the combination arm and in 341 patients in the chemotherapy-alone arm.[28][Level of evidence A1]

###### Trastuzumab with chemotherapy

Trastuzumab may be combined with pembrolizumab and chemotherapy (either 5-FU and cisplatin or CAPOX) as treatment for patients with HER2-positive metastatic gastric adenocarcinoma. For patients who do not tolerate pembrolizumab, trastuzumab may be combined with cisplatin and 5-FU or capecitabine. HER2 testing is recommended for patients with metastatic disease.[29]

Evidence (trastuzumab and pembrolizumab with chemotherapy):

1. The double-blind, placebo-controlled, phase III, international KEYNOTE-811 (https://www.cancer.gov/clinicaltrials/NCT03615326) trial (NCT03615326) studied dual pembrolizumab, trastuzumab, and chemotherapy (either 5-FU with cisplatin or CAPOX). A total of 434 patients with metastatic HER2-positive gastric adenocarcinoma were randomly assigned in a 1:1 ratio to receive either chemotherapy and trastuzumab (6 mg/kg every 3 weeks) with or without pembrolizumab (200 mg intravenously [IV] every 3 weeks).
  - The objective response rate at the first interim analysis was 74.4% (95% CI, 66.2%–81.6%) for patients in the pembrolizumab arm and 51.9% (95% CI, 43.0%–60.7%) for patients in the placebo arm.[29][Level of evidence B3]
  - Adverse events grade 3 or higher were observed in 57.1% of patients in the pembrolizumab arm (including 33.6% of patients with immune-related reactions) and 57.4% of patients in the placebo arm.

Evidence (trastuzumab):

1. In the open-label, international, phase III Trastuzumab for Gastric Cancer trial (ToGA (https://www.cancer.gov/clinicaltrials/NCT01041404) [NCT01041404]), patients with HER2-positive metastatic, inoperable locally advanced, or recurrent gastric or gastroesophageal junction cancer were randomly assigned to receive chemotherapy with or without the anti-HER2 monoclonal antibody trastuzumab.[30] HER2 positivity was defined as either 3+ by IHC or a HER2 to CEP17 ratio of 2 or more using FISH. Tumors from 3,665 patients were tested for HER2; of the patients, 810 were positive (22%) and 594 met eligibility criteria for randomization. Chemotherapy consisted of cisplatin plus 5-FU or capecitabine chosen at the investigator’s discretion. The study treatment was administered every 3 weeks for six cycles, and trastuzumab was continued every 3 weeks until disease progression, unacceptable toxicity, or withdrawal of consent. Crossover to trastuzumab at disease progression was not permitted.
  - The median OS was 13.8 months (95% CI, 12–16) in patients assigned to trastuzumab and 11.1 months (95% CI, 10–13) in patients assigned to chemotherapy alone (HR, 0.74; 95% CI, 0.60–0.91; P = .0046).[30][Level of evidence A1]
  - There was no significant difference in rates of any adverse event, and cardiotoxic effects were equally rare in both arms.

###### Pembrolizumab with chemotherapy

The combination of pembrolizumab and chemotherapy has not shown superiority over chemotherapy alone.

Evidence (pembrolizumab with chemotherapy):

1. A phase III, partially blinded, randomized, international study (KEYNOTE-062 (https://www.cancer.gov/clinicaltrials/NCT02494583) [NCT02494583]) of 763 patients with previously untreated advanced gastric cancer with a PD-L1 CPS of one or greater randomly assigned patients 1:1:1 to receive either pembrolizumab 200 mg IV every 3 weeks, pembrolizumab with chemotherapy (cisplatin with 5-FU or capecitabine), or chemotherapy alone.[31]
  - The final results did not show superiority of pembrolizumab or pembrolizumab with chemotherapy over chemotherapy alone.
  - However, when selected for a PD-L1 CPS of ten or greater, median OS was 17.4 months (95% CI, 9.1−23.1) in the pembrolizumab-alone arm compared with 10.8 months (95% CI, 8.5−13.8) in the chemotherapy-alone arm (HR, 0.69; 95% CI, 0.49−0.97). The prespecified statistical analysis plan did not test this difference further.

#### Second-line palliative systemic therapy

There is no standard treatment option for patients who develop disease progression after first-line palliative chemotherapy. Accepted regimens include paclitaxel with or without ramucirumab, docetaxel, and irinotecan with or without 5-FU/leucovorin. Pembrolizumab is approved for the treatment of patients with dMMR or MSI-H tumors, and trastuzumab deruxtecan is approved for patients with HER2-positive gastric cancer.

##### Palliative chemotherapy

Evidence (palliative chemotherapy):

1. Investigators in Korea randomly assigned patients with advanced gastric cancer who had previously received one or two chemotherapy regimens that involved both a fluoropyrimidine and a platinum agent to receive either salvage chemotherapy or best supportive care in a 2:1 fashion.[32] Salvage chemotherapy consisted of either docetaxel (60 mg/m^2^ every 3 weeks) or irinotecan (150 mg/m^2^ every 2 weeks) and was left to the discretion of the treating physicians. Of the 202 patients enrolled, 133 received salvage chemotherapy and 69 received best supportive care.
  - The median OS was 5.3 months in the group that received salvage chemotherapy and 3.8 months in the group that received best supportive care (HR, 0.657; P = .007).
  - There was no difference in median OS between docetaxel and irinotecan (5.2 months vs. 6.5 months, P = .116).[32][Level of evidence A1]

##### Ramucirumab with or without chemotherapy

Ramucirumab is a fully humanized monoclonal antibody directed against the vascular endothelial growth factor receptor-2.

Evidence (ramucirumab):

1. The international, phase III, placebo-controlled, REGARD (https://www.cancer.gov/clinicaltrials/NCT00917384) trial (NCT00917384) included 355 patients with stage IV gastric or gastroesophageal junction cancer who had progressed on a first-line 5-FU‒ or platinum-containing regimen. Patients were randomly assigned in a 2:1 fashion to receive either ramucirumab or placebo.[33]
  - Patients who were assigned to ramucirumab had a significantly improved median OS of 5.2 months compared with a median OS of 3.8 months in patients who were assigned to the placebo (HR, 0.776; P = .047).
  - Rates of hypertension were higher in the ramucirumab group than in the placebo group.[33][Level of evidence A1]
  Ramucirumab is an acceptable treatment in patients with cisplatin- or 5-FU‒refractory, stage IV, gastric cancer.
2. In the international, double-blinded, phase III RAINBOW (https://www.cancer.gov/clinicaltrials/NCT01170663) trial (NCT01170663), 665 patients were randomly assigned to receive paclitaxel (80 mg/m^2^) on days 1, 8, and 15 every 28 days with either ramucirumab (8 mg/kg) added on days 1 and 15 or a placebo added on days 1 and 15.[34]
  - Patients who were assigned to ramucirumab had a significant improvement in median OS of 9.6 months compared with a median OS of 7.4 months in patients who were assigned to a placebo (HR, 0.807; P = .017).
  - Grade 3 or higher neutropenia, fatigue, hypertension, and abdominal pain were more common in the ramucirumab group.[34][Level of evidence A1]
  The combination of paclitaxel and ramucirumab is an acceptable second-line chemotherapy regimen in patients with stage IV gastric or gastroesophageal junction cancer.

##### Pembrolizumab for patients with dMMR or MSI-H tumors

Evidence (pembrolizumab for patients with dMMR or MSI-H tumors):

1. In a phase II study of pembrolizumab 200 mg IV every 3 weeks in patients with colon cancer with or without dMMR, and noncolorectal cancer with dMMR, the immune-related objective response rate was 71% (5 of 7 patients). Based on these data, pembrolizumab was approved for patients with dMMR solid tumors that have progressed after previous treatment and who have no satisfactory alternative treatment options.[35]

##### Trastuzumab deruxtecan for patients with HER2-positive tumors (3+ on IHC or 2+ on IHC with a positive FISH)

Trastuzumab deruxtecan is an antibody-drug conjugate combining an anti-HER2 antibody with a topoisomerase I inhibitor via a cleavable tetrapeptide-based linker. The U.S. Food and Drug Administration (FDA) approved trastuzumab deruxtecan for patients with locally advanced or metastatic gastric or gastroesophageal junction cancer that is HER2-positive who have previously received a trastuzumab-based regimen.

Evidence (trastuzumab deruxtecan for patients with HER2-positive tumors):

1. The international, open-label, randomized, phase II DESTINY-Gastric01 (https://www.cancer.gov/clinicaltrials/NCT03329690) trial (NCT03329690) included 187 patients from Japan and South Korea with HER2-positive advanced gastric cancer that had progressed after at least two previous therapies (including trastuzumab). Patients were randomly assigned in a 2:1 ratio to receive either trastuzumab deruxtecan (6.4 mg/kg every 3 weeks) or the physician’s choice of chemotherapy. The primary study end point was objective response.[36]
  - The objective response rate was 51% for patients who received trastuzumab deruxtecan and 14% for patients who received chemotherapy (P < .001).
  - The OS was 12.5 months for patients who received trastuzumab deruxtecan and 8.4 months for patients who received chemotherapy (HR, 0.59; 95% CI, 0.39–0.88, P = .02).[36][Level of evidence A1]
  - Common side effects of trastuzumab deruxtecan included neutropenia (grade 3–4 in 51% of patients, with six patients developing neutropenic fever) and anemia (grade 3–4 in 38% of patients). Twelve patients (10%) developed drug-related interstitial lung disease.

#### Third-line palliative systemic therapy

##### Trifluridine and tipiracil

Trifluridine and tipiracil is an oral cytotoxic therapy approved by the FDA for third-line treatment of patients with metastatic gastric or gastroesophageal junction cancer.

Evidence (trifluridine and tipiracil):

1. A randomized, double-blinded, placebo-controlled, international, phase III trial (TAGS (https://www.cancer.gov/clinicaltrials/NCT02500043) [NCT02500043]) included 507 patients with metastatic gastric or gastroesophageal junction adenocarcinoma who had progressive disease after receiving two previous regimens, including a fluoropyrimidine, a platinum agent, and a taxane and/or irinotecan. Patients were randomly assigned in a 2:1 ratio to receive either trifluridine and tipiracil (35 mg/m^2^ twice a day on days 1−5 and 8−12 every 28 days) or placebo.[37]
  - The median OS was 5.7 months (95% CI, 4.8−6.2) in patients who received trifluridine and tipiracil, compared with 3.6 months (95% CI, 3.1−4.1) in patients who received placebo (HR, 0.69; 95% CI, 0.57−0.85; P = .00058).
  - The objective response rate was 4% (disease control rate, 44%) in the trifluridine and tipiracil arm, compared with 2% (disease control rate, 14%) in the placebo arm.
  - Grade 3 or higher adverse events occurred in 80% of patients treated with trifluridine and tipiracil, compared with 58% of patients who received placebo.

##### Immunotherapy

###### Pembrolizumab

While pembrolizumab was previously evaluated as third-line treatment for patients with gastric and gastroesophageal junction cancers and a PD-L1 CPS of one or greater, this approval was withdrawn after updates to first-line therapy using combination chemotherapy and programmed death 1 (PD-1) inhibitors.

###### Nivolumab

Nivolumab has been approved by the Japanese Ministry of Health, Labor, and Welfare for treatment of advanced gastric cancer, regardless of PD-L1 CPS status.

Evidence (nivolumab):

1. A randomized, double-blinded, placebo-controlled, phase III trial (ONO-4538-12 (https://www.cancer.gov/clinicaltrials/NCT02267343) [ATTRACTION-2] [NCT02267343]) enrolled 493 patients with refractory gastroesophageal/gastric cancer from Japan, South Korea, and Taiwan.[38] Patients were randomly assigned 2:1 to receive either nivolumab (3 mg/kg every 2 weeks) or placebo.
  - The median OS was 5.26 months (95% CI, 4.60–6.37) in the nivolumab group compared with 4.14 months (95% CI, 3.42–4.86) in the placebo group.
  - Serious treatment-related adverse events occurred in 10% of the patients.[38][Level of evidence A1]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Shah MA, Shitara K, Ajani JA, et al.: Zolbetuximab plus CAPOX in CLDN18.2-positive gastric or gastroesophageal junction adenocarcinoma: the randomized, phase 3 GLOW trial. Nat Med 29 (8): 2133-2141, 2023.37524953
Shitara K, Lordick F, Bang YJ, et al.: Zolbetuximab plus mFOLFOX6 in patients with CLDN18.2-positive, HER2-negative, untreated, locally advanced unresectable or metastatic gastric or gastro-oesophageal junction adenocarcinoma (SPOTLIGHT): a multicentre, randomised, double-blind, phase 3 trial. Lancet 401 (10389): 1655-1668, 2023.37068504
Waters JS, Norman A, Cunningham D, et al.: Long-term survival after epirubicin, cisplatin and fluorouracil for gastric cancer: results of a randomized trial. Br J Cancer 80 (1-2): 269-72, 1999.10390007 99316895
Ross P, Nicolson M, Cunningham D, et al.: Prospective randomized trial comparing mitomycin, cisplatin, and protracted venous-infusion fluorouracil (PVI 5-FU) With epirubicin, cisplatin, and PVI 5-FU in advanced esophagogastric cancer. J Clin Oncol 20 (8): 1996-2004, 2002.11956258 21953223
Vanhoefer U, Rougier P, Wilke H, et al.: Final results of a randomized phase III trial of sequential high-dose methotrexate, fluorouracil, and doxorubicin versus etoposide, leucovorin, and fluorouracil versus infusional fluorouracil and cisplatin in advanced gastric cancer: A trial of the European Organization for Research and Treatment of Cancer Gastrointestinal Tract Cancer Cooperative Group. J Clin Oncol 18 (14): 2648-57, 2000.10894863 20355110
Van Cutsem E, Moiseyenko VM, Tjulandin S, et al.: Phase III study of docetaxel and cisplatin plus fluorouracil compared with cisplatin and fluorouracil as first-line therapy for advanced gastric cancer: a report of the V325 Study Group. J Clin Oncol 24 (31): 4991-7, 2006.17075117
Al-Batran SE, Homann N, Pauligk C, et al.: Perioperative chemotherapy with fluorouracil plus leucovorin, oxaliplatin, and docetaxel versus fluorouracil or capecitabine plus cisplatin and epirubicin for locally advanced, resectable gastric or gastro-oesophageal junction adenocarcinoma (FLOT4): a randomised, phase 2/3 trial. Lancet 393 (10184): 1948-1957, 2019.30982686
Ajani JA, Ota DM, Jackson DE: Current strategies in the management of locoregional and metastatic gastric carcinoma. Cancer 67 (1 Suppl): 260-5, 1991.1984825 91084760
Guimbaud R, Louvet C, Ries P, et al.: Prospective, randomized, multicenter, phase III study of fluorouracil, leucovorin, and irinotecan versus epirubicin, cisplatin, and capecitabine in advanced gastric adenocarcinoma: a French intergroup (Fédération Francophone de Cancérologie Digestive, Fédération Nationale des Centres de Lutte Contre le Cancer, and Groupe Coopérateur Multidisciplinaire en Oncologie) study. J Clin Oncol 32 (31): 3520-6, 2014.25287828
Cunningham D, Starling N, Rao S, et al.: Capecitabine and oxaliplatin for advanced esophagogastric cancer. N Engl J Med 358 (1): 36-46, 2008.18172173
Cullinan SA, Moertel CG, Fleming TR, et al.: A comparison of three chemotherapeutic regimens in the treatment of advanced pancreatic and gastric carcinoma. Fluorouracil vs fluorouracil and doxorubicin vs fluorouracil, doxorubicin, and mitomycin. JAMA 253 (14): 2061-7, 1985.2579257 85135261
Ohtsu A, Shimada Y, Shirao K, et al.: Randomized phase III trial of fluorouracil alone versus fluorouracil plus cisplatin versus uracil and tegafur plus mitomycin in patients with unresectable, advanced gastric cancer: The Japan Clinical Oncology Group Study (JCOG9205). J Clin Oncol 21 (1): 54-9, 2003.12506170 22393557
Ell C, Hochberger J, May A, et al.: Coated and uncoated self-expanding metal stents for malignant stenosis in the upper GI tract: preliminary clinical experiences with Wallstents. Am J Gastroenterol 89 (9): 1496-500, 1994.7521573 94361072
Murad AM, Santiago FF, Petroianu A, et al.: Modified therapy with 5-fluorouracil, doxorubicin, and methotrexate in advanced gastric cancer. Cancer 72 (1): 37-41, 1993.8508427
Pyrhönen S, Kuitunen T, Nyandoto P, et al.: Randomised comparison of fluorouracil, epidoxorubicin and methotrexate (FEMTX) plus supportive care with supportive care alone in patients with non-resectable gastric cancer. Br J Cancer 71 (3): 587-91, 1995.7533517
Glimelius B, Ekström K, Hoffman K, et al.: Randomized comparison between chemotherapy plus best supportive care with best supportive care in advanced gastric cancer. Ann Oncol 8 (2): 163-8, 1997.9093725
Wagner AD, Grothe W, Haerting J, et al.: Chemotherapy in advanced gastric cancer: a systematic review and meta-analysis based on aggregate data. J Clin Oncol 24 (18): 2903-9, 2006.16782930
Webb A, Cunningham D, Scarffe JH, et al.: Randomized trial comparing epirubicin, cisplatin, and fluorouracil versus fluorouracil, doxorubicin, and methotrexate in advanced esophagogastric cancer. J Clin Oncol 15 (1): 261-7, 1997.8996151
Ajani JA, Moiseyenko VM, Tjulandin S, et al.: Clinical benefit with docetaxel plus fluorouracil and cisplatin compared with cisplatin and fluorouracil in a phase III trial of advanced gastric or gastroesophageal cancer adenocarcinoma: the V-325 Study Group. J Clin Oncol 25 (22): 3205-9, 2007.17664467
Ilson DH: Docetaxel, cisplatin, and fluorouracil in gastric cancer: does the punishment fit the crime? J Clin Oncol 25 (22): 3188-90, 2007.17664464
Ilson DH, Saltz L, Enzinger P, et al.: Phase II trial of weekly irinotecan plus cisplatin in advanced esophageal cancer. J Clin Oncol 17 (10): 3270-5, 1999.10506629
Beretta E, Di Bartolomeo M, Buzzoni R, et al.: Irinotecan, fluorouracil and folinic acid (FOLFIRI) as effective treatment combination for patients with advanced gastric cancer in poor clinical condition. Tumori 92 (5): 379-83, 2006 Sep-Oct.17168428
Pozzo C, Barone C, Szanto J, et al.: Irinotecan in combination with 5-fluorouracil and folinic acid or with cisplatin in patients with advanced gastric or esophageal-gastric junction adenocarcinoma: results of a randomized phase II study. Ann Oncol 15 (12): 1773-81, 2004.15550582
Bouché O, Raoul JL, Bonnetain F, et al.: Randomized multicenter phase II trial of a biweekly regimen of fluorouracil and leucovorin (LV5FU2), LV5FU2 plus cisplatin, or LV5FU2 plus irinotecan in patients with previously untreated metastatic gastric cancer: a Federation Francophone de Cancerologie Digestive Group Study--FFCD 9803. J Clin Oncol 22 (21): 4319-28, 2004.15514373
Ajani JA, Baker J, Pisters PW, et al.: CPT-11 plus cisplatin in patients with advanced, untreated gastric or gastroesophageal junction carcinoma: results of a phase II study. Cancer 94 (3): 641-6, 2002.11857295
Cavanna L, Artioli F, Codignola C, et al.: Oxaliplatin in combination with 5-fluorouracil (5-FU) and leucovorin (LV) in patients with metastatic gastric cancer (MGC). Am J Clin Oncol 29 (4): 371-5, 2006.16891864
Lordick F, Van Cutsem E, Shitara K, et al.: Health-related quality of life in patients with CLDN18.2-positive, locally advanced unresectable or metastatic gastric or gastroesophageal junction adenocarcinoma: results from the SPOTLIGHT and GLOW clinical trials. ESMO Open 9 (8): 103663, 2024.39146670
Janjigian YY, Shitara K, Moehler M, et al.: First-line nivolumab plus chemotherapy versus chemotherapy alone for advanced gastric, gastro-oesophageal junction, and oesophageal adenocarcinoma (CheckMate 649): a randomised, open-label, phase 3 trial. Lancet 398 (10294): 27-40, 2021.34102137
Janjigian YY, Kawazoe A, Yañez P, et al.: The KEYNOTE-811 trial of dual PD-1 and HER2 blockade in HER2-positive gastric cancer. Nature 600 (7890): 727-730, 2021.34912120
Bang YJ, Van Cutsem E, Feyereislova A, et al.: Trastuzumab in combination with chemotherapy versus chemotherapy alone for treatment of HER2-positive advanced gastric or gastro-oesophageal junction cancer (ToGA): a phase 3, open-label, randomised controlled trial. Lancet 376 (9742): 687-97, 2010.20728210
Shitara K, Van Cutsem E, Bang YJ, et al.: Efficacy and Safety of Pembrolizumab or Pembrolizumab Plus Chemotherapy vs Chemotherapy Alone for Patients With First-line, Advanced Gastric Cancer: The KEYNOTE-062 Phase 3 Randomized Clinical Trial. JAMA Oncol 6 (10): 1571-1580, 2020.32880601
Kang JH, Lee SI, Lim do H, et al.: Salvage chemotherapy for pretreated gastric cancer: a randomized phase III trial comparing chemotherapy plus best supportive care with best supportive care alone. J Clin Oncol 30 (13): 1513-8, 2012.22412140
Fuchs CS, Tomasek J, Yong CJ, et al.: Ramucirumab monotherapy for previously treated advanced gastric or gastro-oesophageal junction adenocarcinoma (REGARD): an international, randomised, multicentre, placebo-controlled, phase 3 trial. Lancet 383 (9911): 31-9, 2014.24094768
Wilke H, Muro K, Van Cutsem E, et al.: Ramucirumab plus paclitaxel versus placebo plus paclitaxel in patients with previously treated advanced gastric or gastro-oesophageal junction adenocarcinoma (RAINBOW): a double-blind, randomised phase 3 trial. Lancet Oncol 15 (11): 1224-35, 2014.25240821
Le DT, Uram JN, Wang H, et al.: PD-1 Blockade in Tumors with Mismatch-Repair Deficiency. N Engl J Med 372 (26): 2509-20, 2015.26028255
Shitara K, Bang YJ, Iwasa S, et al.: Trastuzumab Deruxtecan in Previously Treated HER2-Positive Gastric Cancer. N Engl J Med 382 (25): 2419-2430, 2020.32469182
Shitara K, Doi T, Dvorkin M, et al.: Trifluridine/tipiracil versus placebo in patients with heavily pretreated metastatic gastric cancer (TAGS): a randomised, double-blind, placebo-controlled, phase 3 trial. Lancet Oncol 19 (11): 1437-1448, 2018.30355453
Kang YK, Boku N, Satoh T, et al.: Nivolumab in patients with advanced gastric or gastro-oesophageal junction cancer refractory to, or intolerant of, at least two previous chemotherapy regimens (ONO-4538-12, ATTRACTION-2): a randomised, double-blind, placebo-controlled, phase 3 trial. Lancet 390 (10111): 2461-2471, 2017.28993052

## Latest Updates to This Summary (02/21/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

General Information About Gastric Cancer

Updated statistics with estimated new cases and deaths for 2025 (cited American Cancer Society as reference 1).

Revised text to state that, in the United States, gastric cancer ranks 15th in incidence among the major types of cancer (cited National Cancer Institute as reference 8).

Treatment of Stage IV, Inoperable, and Recurrent Gastric Cancer

Revised the list of treatment options for stage IV, inoperable, and recurrent gastric cancer to include monoclonal antibody therapy with chemotherapy for patients with CLDN18.2-positive tumors.

Added Monoclonal antibody therapy with chemotherapy for patients with CLDN18.2-positive tumors as a new subsection.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of gastric cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Gastric Cancer Treatment are:

- Amit Chowdhry, MD, PhD (University of Rochester Medical Center)
- Leon Pappas, MD, PhD (Massachusetts General Hospital )

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Gastric Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/stomach/hp/stomach-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389209]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).